# Adjustment to Cancer: Anxiety and Distress (PDQ®)

Patient Version

This PDQ cancer information summary has current information about normal adjustment issues, and the pathophysiology and treatment of psychosocial distress and the adjustment disorders. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## Overview

Key Points for This Section
- Anxiety and distress can affect the quality of life of people with cancer and their families.
- People with cancer have different levels of distress.
- There are certain risk factors for high levels of distress in people with cancer.
- Screening is done to find out if the person needs help adjusting to cancer.

### Anxiety and distress can affect the quality of life of people with cancer and their families.

People living with cancer feel many different emotions, including anxiety and distress.

- Anxiety is unease, fear, and dread caused by stress.
- Distress is emotional, mental, social, or spiritual suffering. People who are distressed may have a range of feelings, from sadness and a loss of control to depression, anxiety, panic, and isolation.

People with cancer may have anxiety and distress when:

- Being screened for cancer.
- Waiting for test results.
- Hearing a cancer diagnosis.
- Being treated for cancer.
- Worrying that cancer will recur (come back).

Anxiety and distress may cause problems such as nausea and vomiting before each treatment, having more pain than usual, and sleeplessness. People may decide to delay cancer treatment or miss check-ups when they feel anxiety and distress.

Even mild anxiety can affect quality of life for people with cancer and their families and may need to be treated.

### People with cancer have different levels of distress.

Some people with cancer have a low level of distress, and others have higher levels of distress. The level of distress ranges from being able to adjust to living with cancer to having a serious mental health disorder, such as major depression.

This summary describes the less severe levels of distress in adults with cancer, including the following:

- Normal adjustment—A condition in which a person makes changes in his or her life to manage a stressful event such as a cancer diagnosis. In normal adjustment, a person learns to cope well with emotional distress and solve problems related to cancer.
- Psychological and social distress—A condition in which a person has some trouble making changes in their life to manage a stressful event such as a cancer diagnosis. The feelings of distress may range from normal feelings of vulnerability and sadness to feelings that affect quality of life, such as depression, panic, and spiritual crisis. Help from a professional to learn new coping skills may be needed.
- Adjustment disorder—A condition in which a person has a lot of trouble making changes in his or her life to manage a stressful event such as a cancer diagnosis. Symptoms such as depression, anxiety, or other emotional, social, or behavioral problems occur and worsen the person's quality of life. Medicine and help from a professional to manage these symptoms may be needed.
- Anxiety disorder—A condition in which a person has severe anxiety. It may be because of a stressful event like a cancer diagnosis or for no known reason. Symptoms of anxiety disorder include extreme worry, fear, and dread. When the symptoms are severe, it affects a person's ability to lead a normal life. There are many types of anxiety disorders, including the following:
  - Generalized anxiety disorder.
  - Panic disorder (a condition that causes sudden feelings of panic).
  - Agoraphobia (fear of open places or situations in which it might be hard to get help if needed).
  - Social anxiety disorder (fear of social situations).
  - Specific phobia (fear of a specific object or situation).
  - Obsessive-compulsive disorder.
  - Post-traumatic stress disorder.

### There are certain risk factors for high levels of distress in people with cancer.

Nearly half of people with cancer report having a lot of distress. People with lung, pancreatic, and brain cancers may be more likely to report distress, but in general, the type of cancer does not make a difference. Factors that increase the risk of anxiety and distress are not always related to the cancer.

The following are risk factors for high levels of distress in people with cancer:

- Trouble doing the usual activities of daily living.
- Physical problems and side effects of treatment (such as fatigue, nausea, or pain).
- Problems at home.
- Unmet social and spiritual needs.
- Depression, cancer-related post-traumatic stress, or other emotional problems.
- Being diagnosed with advanced-stage cancer.
- Having experienced childhood abuse.
- Being younger, female, or non-White.
- Having a lower level of education.

People who have a high level of distress when they are diagnosed with cancer are more likely to have continued high levels of distress after their diagnosis.

### Screening is done to find out if the person needs help adjusting to cancer.

Screening is usually done by asking the person questions about how they feel, their energy level, relationships, work, and finances. People who show a medium to high level of distress may be referred to a social worker, mental health professional, palliative care specialist, or pastoral counselor for further evaluation and therapy.

This summary is about adjustment to cancer, anxiety, and distress in adults with cancer.

For information on depression and post-traumatic stress related to cancer, see the following:

- Depression
- Cancer-Related Post-Traumatic Stress

## Normal Adjustment

Key Points for This Section
- Each person will cope in different ways.
- People who are adjusting to the changes caused by cancer may have distress.
- People with cancer need different coping skills at different points in time.
  - Hearing the diagnosis
  - Being treated for cancer
  - Remission after treatment
  - Learning that the cancer has come back
  - Stopping cancer treatment
  - Becoming a long-term cancer survivor

### Each person will cope in different ways.

The way people with cancer cope is usually linked to their personality traits (such as whether they usually expect the best versus the worst, or if they are shy versus outgoing).

People find it easier to adjust if they can carry on with their usual routines and work, keep doing activities that matter to them, and cope with stress in their lives. People who adjust well to coping with cancer continue to find meaning and importance in their lives. People who do not adjust well may withdraw from relationships or situations and feel hopeless.

People who are having trouble coping with cancer may find it helpful to talk with a professional about their concerns and worries. These specialists may include the following:

- Mental health professionals, including psychologists and psychiatrists.
- Social workers.
- Palliative care specialists.
- Religious counselors.

### People who are adjusting to the changes caused by cancer may have distress.

Distress can occur when people feel they are unable to manage or control changes caused by cancer. People with the same diagnosis or treatment can have different levels of distress. People have less distress when they feel the demands of the diagnosis and treatment are low or the amount of support they get is high. For example, a health care professional can help the person adjust to the side effects of chemotherapy by giving medicine for nausea.

### People with cancer need different coping skills at different points in time.

Living with a diagnosis of cancer involves many life adjustments. Normal adjustment involves learning to cope with emotional distress and solve problems caused by having cancer.

The coping skills needed will change at different points in a person's cancer journey. These include the following:

- Hearing the diagnosis.
- Being treated for cancer.
- Finishing cancer treatment.
- Learning that the cancer is in remission.
- Learning that the cancer has come back.
- Deciding to stop cancer treatment.
- Becoming a cancer survivor.

#### Hearing the diagnosis

The process of adjusting to cancer begins before people hear the diagnosis. People may feel worried and afraid when they have unexplained symptoms or are having tests done to find out if they have cancer.

A diagnosis of cancer can cause people to have more distress when their fears become true. It may be difficult for people to understand what the doctors are telling them during this time. For more information, see Communication in Cancer Care.

Additional help from health professionals for problems such as fatigue, trouble sleeping, and depression may be needed during this time.

#### Being treated for cancer

As people go through cancer treatment, they use coping skills (also known as coping strategies) to adjust to the stress of treatment.

People who have comorbidities, a decreased ability to manage their daily routines, or a self-reported diagnosis of depression or back pain may be more likely to experience anxiety during chemotherapy treatment than those who do not.

Adjusting to cancer treatment might involve coping skills that help the person change their thoughts or behaviors. For example, changing a daily routine or work schedule to manage the side effects of cancer treatment is a coping skill.

#### Remission after treatment

People may be glad that treatment has ended but feel increased anxiety as they see their treatment team less often. Other concerns include returning to work and family life and being worried about any change in their health.

Many people will feel increased distress after finishing treatment, but this usually does not last long and may go away within a few weeks.

During remission, people may become distressed before follow-up medical visits because they worry that the cancer has come back. Waiting for test results can be very stressful.

#### Learning that the cancer has come back

Cancer that comes back after treatment may cause an increase in distress from having:

- A return of symptoms.
- A sense of hopelessness.
- A negative view of the cancer.

A person's quality of life may be improved if they are able to manage their cancer and have support from friends and family.

#### Stopping cancer treatment

Sometimes cancer comes back or does not get better with treatment. The treatment plan then changes from one that is meant to cure the cancer to one that gives comfort and relieves symptoms. This may cause the person to have an increase in anxiety or depression. For more information, see Depression and Cancer-Related Post-Traumatic Stress.

People who adjust to the return of cancer often keep up hope in meaningful life activities. Some people look to spirituality or religious beliefs to help keep up their quality of life. For more information, see Spirituality in Cancer Care.

#### Becoming a long-term cancer survivor

People adjust to finishing cancer treatment and being long-term cancer survivors over many years. Some common problems reported by cancer survivors as they face the future include the following:

- Feeling anxious that the cancer will come back.
- Feeling a loss of control.
- Having anxiety and nausea in response to reminders of chemotherapy (such as smells or sights).
- Having symptoms of post-traumatic stress, such as being unable to stop thinking about cancer or its treatment or feeling alone or separate from others.
- Feeling tired all of the time.
- Being concerned about body image and sexuality.

Regular exercise and individual or group counseling may help improve these problems and the person's quality of life.

Most people adjust well and some even say that surviving cancer has given them a greater appreciation for life, a better understanding of what is most important in their life, and stronger spiritual or religious beliefs.

Some people may have more trouble adjusting because of medical problems, fewer friends and family members who give support, money problems, or mental health problems not related to the cancer.

## Psychological and Social Distress

Key Points for This Section
- Feelings of physical, emotional, social, or spiritual distress can make it hard to cope with cancer treatment.
- People who are in distress can be helped by different kinds of emotional and social support.

### Feelings of physical, emotional, social, or spiritual distress can make it hard to cope with cancer treatment.

Almost all people living with cancer have feelings of distress. Feelings of distress range from sadness and fears to more serious problems such as depression, anxiety, panic, feeling uncertain about spiritual beliefs, or feeling alone or separate from friends and family.

People who are in distress during any phase of cancer need treatment and support. People are more likely to need to be checked and treated for distress during the following periods:

- Soon after diagnosis.
- At the start of treatment.
- At the end of treatment.
- During remission.
- If the cancer comes back.
- If the goal of treatment changes from curing or controlling cancer to palliative therapy to relieve symptoms and improve quality of life.

### People who are in distress can be helped by different kinds of emotional and social support.

Studies have shown that people who are having trouble adjusting to cancer are helped by treatments that give them emotional and social support, including the following:

- Relaxation training.
- Counseling or talk therapy.
- Cancer education sessions.
- Existential therapy (focuses on the human condition, including what humans are capable of, as well as their limitations).
- Social support in a group setting.

Benefits from these therapies include having lower levels of depression, anxiety, and cancer- and treatment-related symptoms, as well as feeling more hopeful. People who have the most distress seem to get the most relief from these therapies.

## Adjustment Disorders

Key Points for This Section
- Adjustment disorders may cause serious problems in daily life.
- Counseling and other activities can help people with adjustment disorders.
- Counseling may be combined with antianxiety or antidepressant medicine.

### Adjustment disorders may cause serious problems in daily life.

An adjustment disorder occurs when a person's reaction to a stressful event:

- Is more severe than the expected amount of distress.
- Affects relationships or causes problems at home or work.
- Includes symptoms of depression and anxiety or other emotional, social, or behavioral problems.

Stressful events for people with cancer include diagnosis, treatment, cancer recurrence, and when side effects occur. People who have trouble coping with these events may develop an adjustment order. An adjustment disorder usually begins within 3 months of a stressful event.

### Counseling and other activities can help people with adjustment disorders.

Individual (one-to-one) and group counseling have been shown to help people with cancer who have adjustment disorders. Counseling may include treatment that focuses on the person's thoughts, feelings, and behaviors.

The following may help people cope:

- Relaxation training.
- Cognitive behavior therapy.
- Problem-solving.
- Support from friends and family.
- Meditation.
- Yoga.
- Mental imagery exercises.
- Hypnosis.
- Positive thoughts about coping.
- Breathing exercises.

### Counseling may be combined with antianxiety or antidepressant medicine.

People who are having trouble adjusting to cancer should try counseling before medicine. Counseling may not help everyone, and some people may have a mental health disorder, such as severe anxiety or major depression. These people may need an antianxiety or antidepressant medicine along with counseling. For more information, see Depression.

## Anxiety Disorders

Key Points for This Section
- Anxiety disorders are strong fears that may be caused by physical or psychological stress.
- Anxiety disorders affect a person’s quality of life.
- There are different causes of anxiety disorders in people with cancer.
- A cancer diagnosis may cause anxiety disorders to come back in patients with a history of them.
- There are different types of anxiety disorders.
- There are different kinds of treatment for anxiety disorders.
- Medicine may be used alone or combined with other types of treatment for anxiety disorders.

### Anxiety disorders are strong fears that may be caused by physical or psychological stress.

Studies show that almost half of all people with cancer say they feel some anxiety and about one-fourth of all people with cancer say they feel a great deal of anxiety. A person may become more anxious as cancer spreads or treatment becomes more aggressive. This is especially true for people who had an anxiety disorder before their cancer diagnosis.

For some people, anxiety may feel like it is more than they can handle and this may affect their cancer treatment.

Symptoms of anxiety disorders include the following:

- Shortness of breath.
- Fast heartbeat.
- Sweating.
- Restlessness.
- Muscle tightness.
- Feeling faint or dizzy.
- Feeling nauseated.
- Feeling irritable.
- Being afraid they are having a heart attack.
- Being afraid they are “going crazy”.

People are more likely to have anxiety disorders during cancer treatment if they have any of the following:

- A history of an anxiety disorder.
- A history of physical or emotional trauma.
- Anxiety at the time of diagnosis.
- Few family members or friends to give them support.
- Severe pain or other physical symptoms that are not controlled well.
- Cancer that is not getting better with treatment.
- Trouble taking care of their personal needs such as bathing or eating.

### Anxiety disorders affect a person’s quality of life.

An anxiety disorder diagnosis is based on how symptoms of anxiety affect the person's quality of life, what kinds of symptoms began since the cancer diagnosis or treatment, when the symptoms occur, and how long they last.

Anxiety disorders cause serious symptoms that affect day-to-day life, including the following:

- Feeling worried all the time.
- Not being able to learn new information.
- Not being able to "turn off thoughts" most of the time.
- Trouble sleeping most nights.
- Frequent crying spells.
- Feeling afraid most of the time.
- Having symptoms such as fast heartbeat, dry mouth, shaky hands, restlessness, or feeling on edge.
- Anxiety that is not relieved by distraction by staying busy.

### There are different causes of anxiety disorders in people with cancer.

In addition to anxiety caused by a cancer diagnosis, the following may cause an anxiety disorder in people with cancer:

- Pain: People whose pain is not well controlled with medicine feel anxious, and anxiety can increase pain.
- Other medical problems: Sepsis, a low blood oxygen level, heart failure, and electrolyte imbalances can also cause anxiety. Anxiety may be a warning sign of a change in metabolism (such as low blood sugar), a heart attack, severe infection, pneumonia, or a blood clot in the lung.
- Certain types of tumors: Certain tumors of the adrenal gland, pituitary gland, pancreas, or thyroid can cause symptoms of anxiety and panic attacks. Tumors that have spread to the brain and spinal cord and tumors in the lungs can also cause symptoms of anxiety.
- Taking certain drugs: Certain types of drugs, including corticosteroids, thyroxine, bronchodilators, and antihistamines, can cause restlessness, agitation, or anxiety.
- Withdrawing from habit-forming drugs: Withdrawal from alcohol, nicotine, opioids, or antidepressant medicine can cause agitation or anxiety.

Anxiety from these causes is usually managed by treating the cause of the anxiety.

### A cancer diagnosis may cause anxiety disorders to come back in patients with a history of them.

When people who had an anxiety disorder in the past are diagnosed with cancer, the anxiety disorder may come back. These people may feel extreme fear, be unable to remember new information, or be unable to follow through with medical tests and procedures.

### There are different types of anxiety disorders.

People who have intense fear, have trouble understanding information about their cancer, or are unable to cooperate with medical tests should be screened for the following types of anxiety disorders:

- Phobias. Phobias are fears about a situation or an object that lasts over time. People with phobias usually feel intense anxiety and avoid the situation or object they are afraid of. Phobias may make it hard for patients to follow through with tests and procedures or treatment. For example, people with a phobia of needle sticks may avoid having blood drawn for laboratory tests.
- Panic disorder. People with a panic disorder feel sudden intense anxiety, known as panic attacks. A panic attack usually lasts for 10 to 20 minutes, but the fear of having another panic attack may cause feelings of discomfort to continue for longer.
- Generalized anxiety disorder. People with a generalized anxiety disorder may feel extreme and constant anxiety or worry. A person who has generalized anxiety may feel irritable, restless, or dizzy, have tense muscles, shortness of breath, a fast heartbeat, sweating, or get tired quickly.
- Obsessive-compulsive disorder (OCD). OCD is diagnosed when a person uses persistent (obsessive) thoughts, ideas, or images and compulsions (repeated behaviors) to manage feelings of distress. The obsessions and compulsions affect the person's ability to work, go to school, or be in social situations. Examples of compulsions include frequent hand washing or constantly checking to make sure a door is locked.
  People with cancer who have OCD may be unable to follow through with treatment because of persistent thoughts and behaviors. They may also have obsessive thoughts about their cancer coming back. OCD is rare in people with cancer who did not have an anxiety disorder before being diagnosed with cancer.
- Health anxiety disorder. Cancer survivors may develop health anxiety disorder related to their fears about their cancer coming back. This may include being highly alert to any possible physical symptoms, extreme focus on their cancer status, and requesting medical tests and visits with their doctor more often or earlier than needed.
- Post-traumatic stress disorder. Post-traumatic stress can come from feelings of shock, fear, helplessness, and horror at the time of cancer diagnosis. For information, see Cancer-Related Post-Traumatic Stress.

### There are different kinds of treatment for anxiety disorders.

People with anxiety disorders need information and support to understand their cancer and treatment choices. Psychological treatments can also be helpful. These include the following:

- Individual (one-to-one) counseling.
- Couple and family counseling.
- Crisis counseling.
- Group therapy.
- Self-help groups.
- Cognitive behavior therapy.
- Relaxation training, such as hypnosis, meditation, guided imagery, or biofeedback.

Using different methods together may be helpful for some people. For more information, see the Psychological and Social Distress section.

### Medicine may be used alone or combined with other types of treatment for anxiety disorders.

Antianxiety medicines may be used alone or combined with other psychological therapies. These medicines relieve symptoms of anxiety, such as feelings of fear, dread, uneasiness, and muscle tightness. They may relieve daytime distress and lessen trouble sleeping.

Studies show that antidepressants are useful in treating anxiety disorders. Children and teenagers being treated with antidepressants have an increased risk of thinking about suicide and must be watched closely. For more information, see the Treatment section in Depression.

## Current Clinical Trials

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about normal adjustment issues, and the pathophysiology and treatment of psychosocial distress and the adjustment disorders. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Adjustment to Cancer. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/coping/feelings/anxiety-distress-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389325]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).